# Stomach (Gastric) Cancer Screening

Patient Version

This PDQ cancer information summary has current information about stomach (gastric) cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## Stomach Cancer Screening

Screening is looking for cancer before a person has any symptoms (https://www.cancer.gov/types/stomach/symptoms). This can help detect cancer at an early stage. When abnormal tissue or cancer is found early, it may be easier to treat.

In the United States, there are no standard or routine screening tests to detect stomach cancer in people at average risk. Researchers are working to develop such tests. If a test reduces the number of deaths from stomach cancer, it may become a standard screening test.

### Tests to screen for stomach cancer

Some people who have a higher risk of stomach cancer may benefit from screening with upper endoscopy, including:

- older people with chronic gastric atrophy or pernicious anemia
- people who have had
  - partial gastrectomy
  - a family history of stomach cancer
- people who have certain genetic syndromes
- people from countries where stomach cancer is more common

Learn more about risk factors for stomach cancer (https://www.cancer.gov/types/stomach/causes-risk-factors).

#### Upper endoscopy

Upper endoscopy is a procedure to look inside the esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is passed through the mouth and down the throat into the esophagus. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue, which is checked under a microscope for signs of disease.

Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.

Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.

### Risks of stomach cancer screening

Talk with your doctor about whether stomach cancer screening is right for you.

Potential risks of stomach cancer screening include:

- False-negative test results. Screening test results may appear to be normal even though stomach cancer is present. A person who receives a false-negative test result (one that shows there is no cancer when there really is) may delay seeking medical care even if there are symptoms.
- False-positive test results. Screening test results may appear to be abnormal even though no cancer is present. A false-positive test result (one that shows there is cancer when there really isn't) can cause anxiety and is usually followed by more tests and procedures which also have risks.
- Risks of the screening test itself. Upper endoscopy may cause the following rare, but serious, complications:
  - a small hole (puncture) in the esophagus or stomach
  - heart problems
  - breathing problems
  - lung infection from inhaling food, fluid, or stomach acid into the lung
  - severe bleeding that needs to be treated at a hospital
  - reactions to medicine used during the procedure